# PALB2: Cancer Risks and Management (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the genetics of PALB2. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Genetics

The PALB2 (Partner And Localizer of BRCA2) gene is located on chromosome 16p12.2. This gene interacts with both BRCA2 and BRCA1 to restore and maintain genomic stability via homologous recombination repair of DNA double-stranded breaks. Several studies have reported a high penetrance of breast cancer in women who carry PALB2 pathogenic variants. PALB2 is now included on all breast cancer multigene panel tests. Germline biallelic loss-of-function of PALB2 variants (also known as FANCN) lead to Fanconi anemia. Fanconi anemia is a syndrome that is associated with early developmental defects, bone marrow failure, and cancer predisposition.[1]

### References

Wu S, Zhou J, Zhang K, et al.: Molecular Mechanisms of PALB2 Function and Its Role in Breast Cancer Management. Front Oncol 10: 301, 2020.32185139

## Prevalence of PALB2 Pathogenic Variants

Several studies have reported prevalence rates of PALB2 pathogenic variants. These studies included case series, case-control studies, cohort studies, and commercial lab databases. There is considerable heterogeneity among these studies in terms of study design, populations studied, strength of the family history, sequencing techniques, and levels of coverage. Most of these studies included individuals who were referred for clinical genetic testing, and they are, therefore, are not representative of the general population. Prevalence rates in these studies ranged from 0.3% to 1.2%.[1-13] A meta-analysis analyzed data from 48 studies of women who were diagnosed with breast cancer and were referred for genetic testing. This meta-analysis found that prevalence of PALB2 pathogenic variants was 0.9%, and the odds ratio for breast cancer was 4.87.[14] Another study, which included only women with metastatic breast cancer, reported a PALB2 prevalence of 1.8%.[15] A study from a genetic testing lab found a PALB2 prevalence of 0.36% in Caucasian women who were diagnosed with ovarian cancer.[3] Despite the variability in study design and study populations, prevalence rates for PALB2 pathogenic variants were very similar.

PALB2 founder pathogenic variants have been described in Finnish, Polish, Canadian, Russian, Argentinian, Greek, Italian, Australian, and Hispanic populations.

### References

Norquist BM, Harrell MI, Brady MF, et al.: Inherited Mutations in Women With Ovarian Carcinoma. JAMA Oncol 2 (4): 482-90, 2016.26720728
Pritzlaff M, Summerour P, McFarland R, et al.: Male breast cancer in a multi-gene panel testing cohort: insights and unexpected results. Breast Cancer Res Treat 161 (3): 575-586, 2017.28008555
Lilyquist J, LaDuca H, Polley E, et al.: Frequency of mutations in a large series of clinically ascertained ovarian cancer cases tested on multi-gene panels compared to reference controls. Gynecol Oncol 147 (2): 375-380, 2017.28888541
Weitzel JN, Neuhausen SL, Adamson A, et al.: Pathogenic and likely pathogenic variants in PALB2, CHEK2, and other known breast cancer susceptibility genes among 1054 BRCA-negative Hispanics with breast cancer. Cancer 125 (16): 2829-2836, 2019.31206626
Rizzolo P, Zelli V, Silvestri V, et al.: Insight into genetic susceptibility to male breast cancer by multigene panel testing: Results from a multicenter study in Italy. Int J Cancer 145 (2): 390-400, 2019.30613976
Deng M, Chen HH, Zhu X, et al.: Prevalence and clinical outcomes of germline mutations in BRCA1/2 and PALB2 genes in 2769 unselected breast cancer patients in China. Int J Cancer 145 (6): 1517-1528, 2019.30720863
Fan X, Wynn J, Shang N, et al.: Penetrance of Breast Cancer Susceptibility Genes From the eMERGE III Network. JNCI Cancer Spectr 5 (4): , 2021.34377931
Fasching PA, Yadav S, Hu C, et al.: Mutations in BRCA1/2 and Other Panel Genes in Patients With Metastatic Breast Cancer -Association With Patient and Disease Characteristics and Effect on Prognosis. J Clin Oncol 39 (15): 1619-1630, 2021.33780288
Daly MB, Rosenthal E, Cummings S, et al.: The association between age at breast cancer diagnosis and prevalence of pathogenic variants. Breast Cancer Res Treat 199 (3): 617-626, 2023.37084156
Kurian AW, Hughes E, Handorf EA, et al.: Breast and Ovarian Cancer Penetrance Estimates Derived From Germline Multiple-Gene Sequencing Results in Women. JCO Precis Oncol 1: 1-12, 2017.35172496
Kotsopoulos J, Hathaway CA, Narod SA, et al.: Germline Mutations in 12 Genes and Risk of Ovarian Cancer in Three Population-Based Cohorts. Cancer Epidemiol Biomarkers Prev 32 (10): 1402-1410, 2023.37493628
Bucalo A, Conti G, Valentini V, et al.: Male breast cancer risk associated with pathogenic variants in genes other than BRCA1/2: an Italian case-control study. Eur J Cancer 188: 183-191, 2023.37262986
Morra A, Mavaddat N, Muranen TA, et al.: The impact of coding germline variants on contralateral breast cancer risk and survival. Am J Hum Genet 110 (3): 475-486, 2023.36827971
Suszynska M, Klonowska K, Jasinska AJ, et al.: Large-scale meta-analysis of mutations identified in panels of breast/ovarian cancer-related genes - Providing evidence of cancer predisposition genes. Gynecol Oncol 153 (2): 452-462, 2019.30733081
Rolfes M, Borde J, Möllenhoff K, et al.: Prevalence of Cancer Predisposition Germline Variants in Male Breast Cancer Patients: Results of the German Consortium for Hereditary Breast and Ovarian Cancer. Cancers (Basel) 14 (13): , 2022.35805063

## PALB2 Cancer Risks, Spectrum, and Characteristics

### Female Breast Cancer Risk Associated with PALB2 Pathogenic Variants

The association between PALB2 pathogenic variants and female breast cancer was first reported in 2007.[1] After the publication of several small studies, a 2014 report by the PALB2 Interest Group (PALB2-IG) (from 14 international research centers, involving 154 families with loss-of-function PALB2 pathogenic variants) confirmed that the risk range for female breast cancer in PALB2 overlapped with that of BRCA2.[2] Analysis of 311 women from these 154 families found that by age 70, absolute risk of female breast cancer was 33% (95% confidence interval [CI], 24%‒44%) for those without family histories of breast cancer and 58% (95% CI, 50%‒66%) for those with two or more first-degree relatives (FDRs) with early-onset breast cancer. A cohort effect was also observed, in which breast cancer risk was significantly higher in women from more recent birth cohorts. Thirty percent of women with available hormone receptor and human epidermal growth factor receptor 2 (HER2) statuses had triple-negative breast cancers.

In 2019, this study was updated and expanded to include 8,830 women in 524 families from 44 study centers in 21 countries.[3] Families included at least one member with a PALB2 pathogenic variant. Individuals with known BRCA1/2 pathogenic variants were excluded. The absolute risk of breast cancer was 16.9% (95% CI, 13.3%‒21.3%) by age 50 years and 52.8% (95% CI, 43.7%‒62.7%) by age 80 years. Like in the earlier study, both family history and birth cohort were significantly related to risk.

To avoid bias of studying only women with increased breast cancer risk, researchers sequenced PALB2 in 16,501 unselected BRCA1/2-negative breast cancer patients from 10 provinces in China.[4] This study found a PALB2 pathogenic variant prevalence of 0.97%, which is similar to prevalence estimates reported in other studies. The overall odds ratio (OR) for breast cancer risk in women with PALB2 pathogenic variants was 5.23 (95% CI, 2.84‒9.65). However, there was a significant association between breast cancer risk and age, with an OR of 10.09 (95% CI, 3.95‒25.70) for women age 30 years or younger and 5.06 (95% CI, 2.74‒9.43) for women older than 30 years. PALB2 carriers were more likely to have family histories of breast and/or ovarian cancer (20.63% vs.7.96% in noncarriers). These individuals were more likely to have larger tumors and positive axillary lymph nodes than controls. The Breast Cancer Association Consortium (BCAC) sequenced 34 suspected breast cancer susceptibility genes in 60,466 women with invasive breast cancer and 53,461 controls to refine estimates for breast cancer risk.[5] The OR for breast cancer risk in women with PALB2 pathogenic variants was 5.02 (95% CI, 3.73‒6.76). The OR was higher for estrogen receptor (ER)‒negative breast cancer.

### Contralateral Breast Cancer Risk Associated with PALB2 Pathogenic Variants

Data on contralateral breast cancer (CBC) risk in PALB2 carriers are limited. Although there are limited data, both the CARRIERS Consortium and the BCAC have published similar findings.[6,7] The CARRIERS study included data from ten prospective studies of 15,104 women with genotype and phenotype data.[6] The overall hazard ratio (HR) for CBC in PALB2 carriers was 2.9 (95% CI, 1.4‒6.4). CBC risk was seen primarily in women with ER-negative disease. The HR for CBC in PALB2 carriers with ER-negative disease was 3.7 (95% CI, 1.5‒9.0). The 10-year cumulative risk of CBC was 7.9% overall and 19.7% in women with ER-negative breast cancer. CBC risk was significantly higher in African American women with ER-negative breast cancer, in whom the HR was 4.8 (95% CI, 1.4–16.8). CBC risk in this population was observed predominantly in women who were premenopausal when they were diagnosed with breast cancer. The BCAC report included 30,628 women from 34 studies.[7] The HR for CBC in women with PALB2 pathogenic variants was 2.67 (95% CI, 1.35‒5.35). PALB2 carriers had poorer survival when compared with noncarriers, but this association was not significant when it was adjusted to include tumor characteristics.

### Male Breast Cancer Risk Associated with PALB2 Pathogenic Variants

Risk of male breast cancer in the general population is 0.1%. However, this cancer clusters in families with breast cancer cases. While there are few studies on pathogenic variants identified in men diagnosed with breast cancer, several reports have detected PALB2 pathogenic variants in this population. Data on 708 men with breast cancer who underwent testing at one genetic testing lab found an OR of 6.6 (95% CI, 1.7‒21.1) for breast cancer in men with a PALB2 pathogenic variant, although the number of individuals with PALB2 pathogenic variants in this study was small.[8] A large case-control study from Italy that included 767 BRCA1/2-negative men with breast cancer found an OR of 7.28 (95% CI, 1.17‒45.42) for male breast cancer in men with PALB2 pathogenic variants.[9] Like in sporadic male breast cancer, most tumors in men with non-BRCA1/2 pathogenic variants were invasive ductal carcinomas that were ER-positive, progesterone receptor‒positive, and HER2-negative. Similarly, the PALB2-IG study of 524 families with PALB2 pathogenic variants reported a relative risk (RR) of 7.34 (95% CI, 1.28‒42.19) for male breast cancer.[3] Despite small numbers, estimates of male breast cancer risk associated with PALB2 are consistent across studies. PALB2 is emerging as the second-most commonly mutated gene in male breast cancer, after BRCA2.

### Pancreatic Cancer Risk Associated with PALB2 Pathogenic Variants

A study first reported a PALB2 pathogenic variant in an individual with familial pancreatic cancer in 2009 using exome sequencing.[10] In subsequent studies of individuals with exocrine pancreatic cancer, PALB2 pathogenic variants were found in 2% to 4% of participants.[11,12] In the PALB2-IG study (with 524 PALB2 families), the RR was 2.4 (95% CI, 1.24‒4.50) for pancreatic cancer when PALB2 pathogenic variants were present.[3] In individuals with PALB2 pathogenic variants, the absolute lifetime risk of pancreatic cancer is estimated to be between 5% and 10%.

### Ovarian Cancer Risk Associated with PALB2 Pathogenic Variants

Although data on the association between PALB2 pathogenic variants and ovarian cancer are mixed, there is growing acknowledgement that ovarian cancer risk may be moderately increased in PALB2 carriers. Ovarian cancer risk is further increased in women who are diagnosed with ovarian cancer at young ages and in those with family histories of breast/ovarian cancers.

A University of Washington study ascertained the frequency of PALB2 pathogenic variants in patients with ovarian cancer.[13] Patients were unselected for age/family history and were enrolled through a university biobank and two Gynecologic Oncology Group (GOG) clinical trials for advanced ovarian cancer. The OR for ovarian cancer was 10.2 (95% CI, 2.2‒47.0). A similar study on the frequency of pathogenic variants from multigene panel testing in a series of clinically ascertained ovarian cancer cases (participants were referred to one genetic testing lab) found a standardized risk ratio of 3.08 (95% CI, 1.93‒4.67) for PALB2.[14] The authors speculated that this association was driven by a strong association between PALB2 and breast cancer risk, since participants were 3.5-times more likely to have personal or family histories of breast cancer when compared with reference controls. Similar data from a different genetic testing lab reported an OR of 1.60 for ovarian cancer (95% CI, 0.98‒2.60), which did not meet statistical significance.[15] Researchers sequenced the coding regions of 54 candidate genes in 6,385 women with invasive ovarian cancer and 6,115 controls with broad European ancestry from 19 studies (mostly case-control studies).[16] This study found that PALB2 pathogenic variants were associated with a moderate risk of high-grade serous ovarian cancer (OR, 2.60; 95% CI, 1.45‒4.64; P = .0013). The cumulative absolute risk of ovarian cancer in PALB2 carriers by age 80 years was 3.2% (95% CI, 1.8%‒5.7%). Similarly, the PALB2-IG study found an estimated RR of 2.91 (95% CI, 1.40‒6.04) for ovarian cancer in PALB2 carriers and an absolute lifetime ovarian cancer risk of approximately 5%.[3] The aforementioned meta-analysis of 48 studies found an OR of 2.13 for ovarian cancer.[17]

### Other Cancer Risks Associated with PALB2 Pathogenic Variants

PALB2 pathogenic variants have been described in colorectal, gastric, prostate, and other cancers.[3] However, PALB2's contribution to risk in these cancer types has not yet been confirmed. For more information about research on PALB2 and gastric cancer risk, see the Other Genes Associated With Gastric Cancer section in Genetics of Gastric Cancer.

### References

Rahman N, Seal S, Thompson D, et al.: PALB2, which encodes a BRCA2-interacting protein, is a breast cancer susceptibility gene. Nat Genet 39 (2): 165-7, 2007.17200668
Antoniou AC, Casadei S, Heikkinen T, et al.: Breast-cancer risk in families with mutations in PALB2. N Engl J Med 371 (6): 497-506, 2014.25099575
Yang X, Leslie G, Doroszuk A, et al.: Cancer Risks Associated With Germline PALB2 Pathogenic Variants: An International Study of 524 Families. J Clin Oncol 38 (7): 674-685, 2020.31841383
Zhou J, Wang H, Fu F, et al.: Spectrum of PALB2 germline mutations and characteristics of PALB2-related breast cancer: Screening of 16,501 unselected patients with breast cancer and 5890 controls by next-generation sequencing. Cancer 126 (14): 3202-3208, 2020.32339256
Dorling L, Carvalho S, Allen J, et al.: Breast Cancer Risk Genes - Association Analysis in More than 113,000 Women. N Engl J Med 384 (5): 428-439, 2021.33471991
Yadav S, Boddicker NJ, Na J, et al.: Contralateral Breast Cancer Risk Among Carriers of Germline Pathogenic Variants in ATM, BRCA1, BRCA2, CHEK2, and PALB2. J Clin Oncol 41 (9): 1703-1713, 2023.36623243
Morra A, Mavaddat N, Muranen TA, et al.: The impact of coding germline variants on contralateral breast cancer risk and survival. Am J Hum Genet 110 (3): 475-486, 2023.36827971
Pritzlaff M, Summerour P, McFarland R, et al.: Male breast cancer in a multi-gene panel testing cohort: insights and unexpected results. Breast Cancer Res Treat 161 (3): 575-586, 2017.28008555
Bucalo A, Conti G, Valentini V, et al.: Male breast cancer risk associated with pathogenic variants in genes other than BRCA1/2: an Italian case-control study. Eur J Cancer 188: 183-191, 2023.37262986
Jones S, Hruban RH, Kamiyama M, et al.: Exomic sequencing identifies PALB2 as a pancreatic cancer susceptibility gene. Science 324 (5924): 217, 2009.19264984
Slater EP, Langer P, Niemczyk E, et al.: PALB2 mutations in European familial pancreatic cancer families. Clin Genet 78 (5): 490-4, 2010.20412113
Hofstatter EW, Domchek SM, Miron A, et al.: PALB2 mutations in familial breast and pancreatic cancer. Fam Cancer 10 (2): 225-31, 2011.21365267
Norquist BM, Harrell MI, Brady MF, et al.: Inherited Mutations in Women With Ovarian Carcinoma. JAMA Oncol 2 (4): 482-90, 2016.26720728
Lilyquist J, LaDuca H, Polley E, et al.: Frequency of mutations in a large series of clinically ascertained ovarian cancer cases tested on multi-gene panels compared to reference controls. Gynecol Oncol 147 (2): 375-380, 2017.28888541
Kurian AW, Hughes E, Handorf E: Association of ovarian cancer (OC) risk with mutations detected by multiple-gene germline sequencing in 95,561 women. [Abstract] J Clin Oncol 34 (Suppl 15): A-5510, 2016. Also available online (https://ascopubs.org/doi/10.1200/JCO.2016.34.15_suppl.5510). Last accessed November 7, 2024.
Song H, Dicks EM, Tyrer J, et al.: Population-based targeted sequencing of 54 candidate genes identifies PALB2 as a susceptibility gene for high-grade serous ovarian cancer. J Med Genet 58 (5): 305-313, 2021.32546565
Suszynska M, Klonowska K, Jasinska AJ, et al.: Large-scale meta-analysis of mutations identified in panels of breast/ovarian cancer-related genes - Providing evidence of cancer predisposition genes. Gynecol Oncol 153 (2): 452-462, 2019.30733081

## Cancer Surveillance and Risk Management in PALB2 Carriers

The National Comprehensive Cancer Network (NCCN) recommends breast cancer screening with annual mammogram and breast magnetic resonance imaging (MRI) with contrast starting at age 30 years in women with PALB2 pathogenic variants.[1] Given the increased contralateral breast cancer risk seen in premenopausal women with PALB2 pathogenic variants, MRI screening can also be conducted following a primary breast cancer. However, MRI screening may be of little benefit after age 65 years in this population. Risk-reducing mastectomy can be considered, based on the individual’s family history. In men with PALB2 pathogenic variants, breast cancer screening with annual mammogram may be considered starting at age 50 years or 10 years earlier than the youngest breast cancer diagnosis in the family. Risk-reducing salpingo-oophorectomy may be considered for women starting at age 45 to 50 years. Because family history can impact ovarian cancer risk in PALB2 carriers, individualized risk assessment is encouraged.[2] Protocols for pancreatic cancer screening vary but mainly include contrast-enhanced MRI/magnetic resonance cholangiopancreatography and endoscopic ultrasound starting at age 50 years or 10 years before the earliest pancreatic cancer diagnosis in the family.[1] Historically, professional organizations have recommended pancreatic cancer screening only when a family history of pancreatic cancer is present. However, recommendations conflict across professional organizations when a family history of pancreatic cancer is absent. Ongoing discussions with health care providers is encouraged, given the evolving data.

### References

National Comprehensive Cancer Network: NCCN Clinical Practice Guidelines in Oncology: Genetic/Familial High-Risk Assessment: Breast, Ovarian, and Pancreatic. Version 1.2025 . Plymouth Meeting, Pa: National Comprehensive Cancer Network, 2025. Available online with free registration. (https://www.nccn.org/professionals/physician_gls/pdf/genetics_bop.pdf) Last accessed October 30, 2024.
Hanson H, Kulkarni A, Loong L, et al.: UK consensus recommendations for clinical management of cancer risk for women with germline pathogenic variants in cancer predisposition genes: RAD51C, RAD51D, BRIP1 and PALB2. J Med Genet 60 (5): 417-429, 2023.36411032

## Prognosis in PALB2 Carriers

### Breast Cancer Prognosis in PALB2 Carriers

A prospective cohort study of 12,529 women with invasive breast cancer in Poland first reported an excess of triple-negative breast cancer (TNBC) in PALB2 carriers when compared with noncarriers.[1] In this study, the hazard ratio (HR) for death associated with PALB2 pathogenic variants was 2.19 (95% confidence interval, 1.59‒3.02). However, this HR pertained to women with tumors larger than 2 cm. In a study of 16,501 unselected BRCA1/2-negative breast cancer patients from China, PALB2 carriers were significantly more likely to have TNBCs than noncarriers (22.83% vs. 13.56%, respectively).[2] PALB2 carriers had larger tumors, more positive axillary lymph nodes, and more contralateral breast cancers. Other studies reported that PALB2 carriers had TNBC rates ranging from 30% to 40%.[3] A large population-based study in China observed a significantly shorter overall survival in PALB2 carriers with breast cancer than in noncarriers.[4]

### References

Cybulski C, Kluźniak W, Huzarski T, et al.: Clinical outcomes in women with breast cancer and a PALB2 mutation: a prospective cohort analysis. Lancet Oncol 16 (6): 638-44, 2015.25959805
Zhou J, Wang H, Fu F, et al.: Spectrum of PALB2 germline mutations and characteristics of PALB2-related breast cancer: Screening of 16,501 unselected patients with breast cancer and 5890 controls by next-generation sequencing. Cancer 126 (14): 3202-3208, 2020.32339256
Antoniou AC, Casadei S, Heikkinen T, et al.: Breast-cancer risk in families with mutations in PALB2. N Engl J Med 371 (6): 497-506, 2014.25099575
Deng M, Chen HH, Zhu X, et al.: Prevalence and clinical outcomes of germline mutations in BRCA1/2 and PALB2 genes in 2769 unselected breast cancer patients in China. Int J Cancer 145 (6): 1517-1528, 2019.30720863

## Cancer Treatment in PALB2 Carriers

Because PALB2 pathogenic variants are relatively rare, data on treatment are scarce. However, PALB2 interacts with BRCA1/2 to maintain the integrity of the homologous recombination pathway. Therefore, tumors that lack PALB2 activity may respond similarly to drugs that are effective in BRCA1/2-mutated tumors. A number of studies have reported that solid tumors with PALB2 pathogenic variants had increased sensitivity to platinum agents.[1] Several phase II trials have suggested that poly (ADP-ribose) polymerase (PARP) inhibitors may exhibit activity in patients with PALB2 pathogenic variants. Although some data show that tumors with PALB2 pathogenic variants have high tumor mutational burdens and tumor neoantigen burdens, data on the activity of immunosuppressive therapies are lacking. Several studies are examining the efficacy of using PARP inhibitors with other agents in PALB2-mutated breast tumors, ovarian tumors, and other solid tumors.[2]

### References

Tischkowitz M, Balmaña J, Foulkes WD, et al.: Management of individuals with germline variants in PALB2: a clinical practice resource of the American College of Medical Genetics and Genomics (ACMG). Genet Med 23 (8): 1416-1423, 2021.33976419
Toss A, Ponzoni O, Riccò B, et al.: Management of PALB2-associated breast cancer: A literature review and case report. Clin Case Rep 11 (8): e7747, 2023.37621724

## PALB2 Summary

Although rare, PALB2 pathogenic variants significantly increase the risk of breast, pancreatic, and ovarian cancers. PALB2 pathogenic variant prevalence rates in published studies range from 0.3% to 1.8% and have been found in countries across the globe. Rates of breast cancer in individuals with PALB2 pathogenic variants are similar to those associated with BRCA2. However, individuals with PALB2 and BRCA2 pathogenic variants have higher rates of triple-negative breast cancer. PALB2 pathogenic variants are also associated with increased risks of contralateral breast cancer and male breast cancer.

PALB2 carriers have significantly increased risk to develop pancreatic cancer. Although there are conflicting data about PALB2’s role in ovarian cancer, there is also growing evidence that PALB2 pathogenic variants confer moderately increased ovarian cancer risk.

Surveillance and risk management recommendations are mainly based on data from BRCA trials. There is increased interest and activity in clinical trials to include individuals who carry PALB2 pathogenic variants.

## Latest Updates to This Summary (02/14/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about PALB2. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Cancer Genetics Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/genetics), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for PALB2 are:

- Doreen Agnese, MD (The Ohio State University)
- Ilana Cass, MD (Dartmouth-Hitchcock Medical Center)
- Lee-may Chen, MD (UCSF Helen Diller Family Comprehensive Cancer Center)
- Mary B. Daly, MD, PhD (Fox Chase Cancer Center)
- Megan Frone, MS, CGC (National Cancer Institute)
- Jessica Hatton , MS, CGC (National Cancer Institute)
- Joanne Kotsopoulos, PhD (University of Toronto and Women's College Hospital)
- Tuya Pal, MD, FACMG, FCCMG (Vanderbilt-Ingram Cancer Center)
- Padma Sheila Rajagopal, MD, MPH, MSC (National Cancer Institute)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Cancer Genetics Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Cancer Genetics Editorial Board. PDQ PALB2. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/publications/pdq/information-summaries/genetics/palb2-hp-pdq. Accessed <MM/DD/YYYY>.

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).